# Nasopharyngeal Cancer Treatment (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of adult nasopharyngeal cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board.

## General Information About Nasopharyngeal Cancer

Key Points for This Section
- Nasopharyngeal cancer is a type of head and neck cancer that starts in the tissues of the nasopharynx.
- Being exposed to the Epstein-Barr virus, your ancestry, and where you live can affect the risk of nasopharyngeal cancer.
- Signs and symptoms of nasopharyngeal cancer include trouble breathing, speaking, or hearing.
- Tests that examine the nose, throat, and nearby organs are used to diagnose and stage nasopharyngeal cancer.
- Some people may decide to get a second opinion.
- Certain factors affect prognosis (chance of recovery) and treatment options.

### Nasopharyngeal cancer is a type of head and neck cancer that starts in the tissues of the nasopharynx.

The pharynx is a hollow tube in the neck about 5 inches long that is made up of three parts:

- The nasopharynx is the upper part of the pharynx, located behind the nose. The nostrils are connected to the nasopharynx. Openings on each side of the nasopharynx lead to the ears.
- The oropharynx is the middle part, located beneath the nasopharynx.
- The hypopharynx is the lowermost part of the pharynx, opening up to both the trachea (windpipe) and esophagus.

When we breathe or swallow, the pharynx acts as a passageway for air to reach the lungs and food to reach the stomach. Nasopharyngeal cancer commonly begins in the squamous cells that line the nasopharynx.

Anatomy of the pharynx. The pharynx is a hollow, muscular tube inside the neck that starts behind the nose and opens into the larynx and esophagus. The three parts of the pharynx are the nasopharynx, oropharynx, and hypopharynx.

Anatomy of the pharynx; drawing shows the nasopharynx, oropharynx, and hypopharynx. Also shown are the nasal cavity, oral cavity, hyoid bone, larynx, esophagus, and trachea.

### Being exposed to the Epstein-Barr virus, your ancestry, and where you live can affect the risk of nasopharyngeal cancer.

Nasopharyngeal cancer is caused by certain changes in how nasopharyngeal cells function, especially how they grow and divide into new cells. There are many risk factors for nasopharyngeal cancer, but many do not directly cause cancer. Instead, they increase the chance of DNA damage in cells that may lead to nasopharyngeal cancer. Learn more about how cancer develops at What Is Cancer? (https://www.cancer.gov/about-cancer/understanding/what-is-cancer)

A risk factor is anything that increases a person's chance of getting a disease. Some risk factors for nasopharyngeal cancer, like tobacco use, can be changed. Risk factors also include things you cannot change, like your family history. Learning about risk factors for nasopharyngeal cancer can help you make choices that might prevent or lower your risk of getting it.

Risk factors for nasopharyngeal cancer include:

- being infected with Epstein-Barr virus (EBV)
- living in or having ancestry in certain parts of Asia, North Africa, and the Arctic
- having a family member with nasopharyngeal cancer
- using tobacco or breathing in secondhand smoke
- frequent and heavy alcohol use
- having a diet high in salt-cured fish and meats because these foods may contain cancer-causing chemicals, such as nitrosamine

Nasopharyngeal cancer can occur at any age. In areas where the disease is not common, it is more likely to be diagnosed in people who are older than 50 years. In high-risk areas, younger people are more likely to be affected. Men tend to develop nasopharyngeal cancer more often than women. In rare cases, human papillomavirus (HPV), especially HPV type 16, has been linked to nasopharyngeal cancer. Learn about HPV and Cancer (https://www.cancer.gov/about-cancer/causes-prevention/risk/infectious-agents/hpv-fact-sheet).

### Signs and symptoms of nasopharyngeal cancer include trouble breathing, speaking, or hearing.

The signs and symptoms of nasopharyngeal cancer can vary from person to person. Early signs and symptoms of nasopharyngeal cancer may include:

- a lump in the neck
- pain, pulsing, or ringing in the ear
- trouble hearing
- a sore throat
- stuffy nose
- nosebleeds

Signs and symptoms of advanced nasopharyngeal cancer (nasopharyngeal cancer that has spread to other parts of the body) may include symptoms of early-stage nasopharyngeal cancer and:

- misalignment of the eyes (strabismus)
- double vision
- headaches
- facial numbness
- facial weakness

These problems may be caused by conditions other than nasopharyngeal cancer. Check with your doctor if you have any of these problems to find out the cause and begin treatment, if needed.

### Tests that examine the nose, throat, and nearby organs are used to diagnose and stage nasopharyngeal cancer.

If you have symptoms that suggest nasopharyngeal cancer, your doctor will need to find out if these are due to cancer or another problem. They will ask when the symptoms started and how often you have been having them. They will also ask about your personal and family health history and do a physical exam. Based on these results, the doctor may recommend other tests. If you are diagnosed with nasopharyngeal cancer, the results of these tests will help you and your doctor plan treatment.

The following tests and procedures are used to diagnose and stage nasopharyngeal cancer:

- Nasopharyngoscopy with biopsy is a procedure to examine the inside of the nose and back of the throat. The doctor inserts a nasopharyngoscope (a thin, flexible lighted tube) in the nose and advances it to the back of the throat to check for abnormal areas. The nasopharyngoscope may have a tool to remove a sample of cells or tissue (biopsy) so a pathologist can view it under a microscope to check for signs of cancer. Learn about the type of information that can be found in a pathologist's report about the cells or tissue removed during a biopsy at Pathology Reports (https://www.cancer.gov/about-cancer/diagnosis-staging/diagnosis/pathology-reports-fact-sheet).
- MRI (magnetic resonance imaging) uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body. This procedure is also called nuclear magnetic resonance imaging (NMRI).
- PET-CT scan combines pictures from a positron emission tomography (PET) scan and a computed tomography (CT) scan. The PET and CT scans are done at the same time on the same machine. The combined pictures make a more detailed picture than either test would make by itself.
  - For the PET scan, a small amount of radioactive glucose (sugar) is injected into a vein. The scanner rotates around the body and makes a picture of where glucose is being used in the body. Because cancer cells often take up more glucose than normal cells, the pictures can be used to find cancer cells in the body.
  - For the CT scan, a series of detailed x-ray pictures of areas inside the body is taken from different angles. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly.
- Epstein-Barr virus (EBV) test is a blood test to check for antibodies and DNA markers that are found in the blood of people who have been infected with EBV.
- Human papillomavirus (HPV) test is a laboratory test used to check a sample of tissue for certain types of HPV infection. An HPV test is usually done if the EBV test is negative. This is because in rare cases, HPV can cause nasopharyngeal cancer.
- A neurological exam uses a series of questions and tests to check brain, spinal cord, and nerve function. The exam checks your mental status, coordination, and ability to walk normally, and how well the muscles, senses, and reflexes work. This may also be called a neuro exam or a neurologic exam.
- A hearing test checks your ability to hear soft and loud sounds and low- and high-pitched sounds. Each ear is checked separately. This test is done because nasopharyngeal cancer and its treatment can affect hearing. Hearing tests are usually done before, during, and after treatment.
- Blood chemistry study is a laboratory test in which a blood sample is checked to measure the amounts of certain substances released into the blood by organs and tissues in the body. An unusual (higher or lower than normal) amount of a substance can be a sign of disease.
- Complete blood count (CBC) is a laboratory test in which a sample of blood is drawn and checked for:
  - the number of red blood cells, white blood cells, and platelets
  - the amount of hemoglobin (the substance in the blood that carries oxygen) in the red blood cells
  - the amount of hematocrit (whole blood that is made up of red blood cells)
  Complete blood count (CBC). Blood is collected by inserting a needle into a vein and allowing the blood to flow into a tube. The blood sample is sent to the laboratory and the red blood cells, white blood cells, and platelets are counted. The CBC is used to test for, diagnose, and monitor many different conditions.
  Complete blood count (CBC); left panel shows blood being drawn from a vein on the inside of the elbow using a tube attached to a syringe; right panel shows a laboratory test tube with blood cells separated into layers: plasma, white blood cells, platelets, and red blood cells.

### Some people may decide to get a second opinion.

You may want to get a second opinion to confirm your nasopharyngeal cancer diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. They may agree with the first doctor, suggest changes or another treatment approach, or provide more information about your cancer.

Learn more about choosing a doctor and getting a second opinion at Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor, hospital, or getting a second opinion. For questions you might want to ask at your appointments, visit Questions to Ask Your Doctor About Cancer (https://www.cancer.gov/about-cancer/coping/questions).

### Certain factors affect prognosis (chance of recovery) and treatment options.

The prognosis and treatment options depend on:

- the size of the tumor
- the stage of the cancer, including whether cancer has spread to one or more lymph nodes in the neck
- whether there are high levels of EBV antibodies and EBV-DNA markers in the blood before and after treatment

## Stages of Nasopharyngeal Cancer

Key Points for This Section
- Cancer stage describes the extent of cancer in the body.
- The following stages are used for nasopharyngeal cancer:
  - Stage 0 (also called carcinoma in situ of the nasopharynx)
  - Stage I (also called stage 1) nasopharyngeal cancer
  - Stage II (also called stage 2) nasopharyngeal cancer
  - Stage III (also called stage 3) nasopharyngeal cancer
  - Stage IV (also called stage 4) nasopharyngeal cancer
- Nasopharyngeal cancer can recur (come back) after it has been treated.

### Cancer stage describes the extent of cancer in the body.

Cancer stage describes the extent of cancer in the body, such as the size of the tumor, whether it has spread, and how far it has spread from where it first formed. Knowing the cancer stage helps plan treatment.

There are several staging systems for cancer that describe the extent of the cancer. Nasopharyngeal cancer staging usually uses the TNM staging system. The cancer may be described by this staging system in your pathology report. Based on the TNM results, a stage (I, II, III, or IV, also written as 1, 2, 3, or 4) is assigned to the cancer. When talking to you about your diagnosis, your doctor may describe the cancer as one of these stages.

Learn more about Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging).

### The following stages are used for nasopharyngeal cancer:

#### Stage 0 (also called carcinoma in situ of the nasopharynx)

In stage 0, abnormal cells are found in the lining of the nasopharynx. These abnormal cells may become cancer and spread into nearby normal tissue.

#### Stage I (also called stage 1) nasopharyngeal cancer

In stage I, cancer has formed, and the cancer:

- is found in the nasopharynx only; or
- has spread from the nasopharynx to the oropharynx and/or to the nasal cavity.

Tumor sizes are often measured in centimeters (cm) or inches. Common food items that can be used to show tumor size in cm include: a pea (1 cm), a peanut (2 cm), a grape (3 cm), a walnut (4 cm), a lime (5 cm or 2 inches), an egg (6 cm), a peach (7 cm), and a grapefruit (10 cm or 4 inches).

Drawing shows different sizes of a tumor in centimeters (cm) compared to the size of a pea (1 cm), a peanut (2 cm), a grape (3 cm), a walnut (4 cm), a lime (5 cm), an egg (6 cm), a peach (7 cm), and a grapefruit (10 cm). Also shown is a 10-cm ruler and a 4-inch ruler.

#### Stage II (also called stage 2) nasopharyngeal cancer

In stage II, one of the following is true:

- Cancer has spread to one or more lymph nodes on one side of the neck and/or to one or more lymph nodes on one or both sides of the back of the throat. The affected lymph nodes are 6 centimeters or smaller. Cancer is found:
  - in the nasopharynx only or has spread from the nasopharynx to the oropharynx and/or to the nasal cavity; or
  - only in the lymph nodes in the neck. The cancer cells in the lymph nodes are infected with Epstein-Barr virus (a virus linked to nasopharyngeal cancer).
- Cancer has spread to the parapharyngeal space and/or nearby muscles. Cancer may have also spread to one or more lymph nodes on one side of the neck and/or to one or more lymph nodes on one or both sides of the back of the throat. The affected lymph nodes are 6 centimeters or smaller.

#### Stage III (also called stage 3) nasopharyngeal cancer

In stage III, one of the following is true:

- Cancer has spread to one or more lymph nodes on both sides of the neck. The affected lymph nodes are 6 centimeters or smaller. Cancer is found:
  - in the nasopharynx only or has spread from the nasopharynx to the oropharynx and/or to the nasal cavity; or
  - only in the lymph nodes in the neck. The cancer cells in the lymph nodes are infected with Epstein-Barr virus (a virus linked to nasopharyngeal cancer).
- Cancer has spread to the parapharyngeal space and/or nearby muscles. Cancer has also spread to one or more lymph nodes on both sides of the neck. The affected lymph nodes are 6 centimeters or smaller.
- Cancer has spread to the bones at the bottom of the skull, the bones in the neck, jaw muscles, and/or the sinuses around the nose and eyes. Cancer may have also spread to one or more lymph nodes on one or both sides of the neck and/or the back of the throat. The affected lymph nodes are 6 centimeters or smaller.

#### Stage IV (also called stage 4) nasopharyngeal cancer

Stage IV is divided into stages IVA and IVB.

- In stage IVA:
  - Cancer has spread to the brain, the cranial nerves, the hypopharynx, the salivary gland in the front of the ear, the bone around the eye, and/or the soft tissues of the jaw. Cancer may have also spread to one or more lymph nodes on one or both sides of the neck and/or the back of the throat. The affected lymph nodes are 6 centimeters or smaller; or
  - Cancer has spread to one or more lymph nodes on one or both sides of the neck. The affected lymph nodes are larger than 6 centimeters and/or are found in the lowest part of the neck.
- In stage IVB: Cancer has spread beyond the lymph nodes in the neck to distant lymph nodes, such as those between the lungs, below the collarbone, or in the armpit or groin, or to other parts of the body, such as the lung, bone, or liver.

Stage IV nasopharyngeal cancer is also called metastatic nasopharyngeal cancer. Metastatic cancer happens when cancer cells travel through the lymphatic system or blood and form tumors in other parts of the body. The metastatic tumor is the same type of cancer as the primary tumor. For example, if nasopharyngeal cancer spreads to the lung, the cancer cells in the lung are actually nasopharyngeal cancer cells. The disease is called metastatic nasopharyngeal cancer, not lung cancer. Learn more in Metastatic Cancer: When Cancer Spreads (https://www.cancer.gov/types/metastatic-cancer).

### Nasopharyngeal cancer can recur (come back) after it has been treated.

Recurrent nasopharyngeal cancer is cancer that has come back after it has been treated. If nasopharyngeal cancer comes back, it may come back in the nasopharynx, lymph nodes, or other parts of the body, such as the lungs, bone, or liver. Tests will help determine where in the body the cancer has returned. The type of treatment that you have for recurrent nasopharyngeal cancer will depend on where it has come back.

Learn more in Recurrent Cancer: When Cancer Comes Back (https://www.cancer.gov/types/recurrent-cancer). Information to help you cope and talk with your health care team can be found in the booklet When Cancer Returns (https://www.cancer.gov/publications/patient-education/when-cancer-returns).

## Treatment Option Overview

Key Points for This Section
- There are different types of treatment for people with nasopharyngeal cancer.
- The following types of treatment are used:
  - Radiation therapy
  - Chemotherapy
  - Surgery
- Treatment for nasopharyngeal cancer may cause side effects.
- New types of treatment are being tested in clinical trials.
- Follow-up care may be needed.

### There are different types of treatment for people with nasopharyngeal cancer.

Different types of treatments are available for nasopharyngeal cancer. You and your cancer care team will work together to decide your treatment plan, which may include more than one type of treatment. Many factors will be considered, such as the stage of the cancer, your overall health, and your preferences. Your plan will include information about your cancer, the goals of treatment, your treatment options and the possible side effects, and the expected length of treatment.

Talking with your cancer care team before treatment begins about what to expect will be helpful. You'll want to learn what you need to do before treatment begins, how you'll feel while going through it, and what kind of help you will need. Learn more at Questions to Ask Your Doctor About Your Treatment (https://www.cancer.gov/about-cancer/treatment/questions).

### The following types of treatment are used:

#### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill cancer cells or keep them from growing by damaging their DNA. The way radiation therapy is given depends on the type and stage of the cancer. External and internal radiation therapy are used to treat nasopharyngeal cancer.

- External radiation therapy uses a machine outside the body to send radiation toward the area of the body with cancer.
  External-beam radiation therapy of the head and neck. A machine is used to aim high-energy radiation at the cancer. The machine can rotate around the patient, delivering radiation from many different angles to provide highly conformal treatment. A mesh mask helps keep the patient’s head and neck from moving during treatment. Small ink marks are put on the mask. The ink marks are used to line up the radiation machine in the same position before each treatment.
  External-beam radiation therapy of the head and neck; drawing shows a patient lying on a table under a machine that is used to aim high-energy radiation at the cancer. An inset shows a mesh mask that helps keep the patient's head and neck from moving during treatment. The mask has pieces of white tape with small ink marks on it. The ink marks are used to line up the radiation machine in the same position before each treatment.
  Certain ways of giving radiation therapy can help keep radiation from damaging nearby healthy tissue. These include:
  - Intensity-modulated radiation therapy (IMRT): IMRT is a type of 3-dimensional (3-D) radiation therapy that uses a computer to make pictures of the size and shape of the tumor. Thin beams of radiation of different intensities (strengths) are aimed at the tumor from many angles. Compared to standard radiation therapy, intensity-modulated radiation therapy may be less likely to cause dry mouth. You will likely have treatment once a day, Monday through Friday, for about 6 to 7 weeks.
  - Stereotactic radiation therapy: Stereotactic radiation therapy also uses a computer to make detailed images of the tumor. Thin beams of radiation are aimed at the tumor from different angles. High-dose radiation is given in one to five sessions spread over several days. This procedure is also called stereotactic external-beam radiation and stereotaxic radiation therapy.
  External radiation therapy to the thyroid or the pituitary gland may change the way the thyroid gland works. A blood test to check the thyroid hormone level in the blood is done before and after therapy to make sure the thyroid gland is working properly. It is also important that a dentist check your teeth, gums, and mouth, and fix any existing problems before radiation therapy begins.
- Internal radiation therapy (also called brachytherapy) uses a radioactive substance sealed in needles, seeds, wires, or catheters that are placed directly into or near the cancer. In some cases, it may be used with external radiation therapy to deliver an extra dose of radiation directly to the tumor. Learn more about Brachytherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy/brachytherapy).

#### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of cancer cells, either by killing the cells or by stopping them from dividing. Chemotherapy for nasopharyngeal cancer is usually systemic, meaning it is taken by mouth or injected into a vein or muscle. When given this way, the drugs enter the bloodstream and can reach cancer cells throughout the body.

Chemotherapy drugs used to treat nasopharyngeal cancer include:

- carboplatin (https://www.cancer.gov/about-cancer/treatment/drugs/carboplatin)
- cisplatin (https://www.cancer.gov/about-cancer/treatment/drugs/cisplatin)
- docetaxel (https://www.cancer.gov/about-cancer/treatment/drugs/docetaxel)
- fluorouracil (https://www.cancer.gov/about-cancer/treatment/drugs/fluorouracil)
- gemcitabine (https://www.cancer.gov/about-cancer/treatment/drugs/gemcitabinehydrochloride)

Combinations of these drugs may be used. Other chemotherapy drugs not listed here may also be used.

Chemotherapy may be combined with other types of treatment, such as radiation therapy.

To learn more about how chemotherapy works, how it is given, common side effects, and more, visit Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy) and Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you).

#### Surgery

Surgery to remove the tumor is sometimes used for nasopharyngeal cancer that does not respond to radiation therapy. If cancer has spread to the lymph nodes, the doctor may remove lymph nodes and other tissues in the neck.

Learn more about Surgery to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/surgery).

### Treatment for nasopharyngeal cancer may cause side effects.

For information about side effects caused by treatment for cancer, visit our Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects) page.

Side effects from cancer treatment that begin after treatment and continue for months or years are called late effects. Late effects of nasopharyngeal cancer treatment may include:

- chronic dry mouth
- dental and oral complications
- hearing loss
- vision loss
- difficulty swallowing
- lockjaw
- problems with the thyroid and pituitary gland
- damage to nerves in the brain
- changes in mood, feelings, thinking, learning, or memory

Some late effects may be treated or controlled. It is important to talk with your doctor about possible late effects caused by some treatments.

### New types of treatment are being tested in clinical trials.

For some people, joining a clinical trial may be an option. There are different types of clinical trials for people with cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Follow-up care may be needed.

As you go through treatment, you will have follow-up tests or check-ups. Some tests that were done to diagnose or stage the cancer may be repeated to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your condition has changed or if the cancer has recurred (come back).

After treatment is complete, it is important to have head and neck exams to look for signs that the cancer has come back.

## Treatment of Stage I Nasopharyngeal Cancer

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of stage I nasopharyngeal cancer is usually radiation therapy to the tumor and lymph nodes in the neck.

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage II, III, and IVA Nasopharyngeal Cancer

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of stage II, III, and IVA (nonmetastatic) nasopharyngeal cancer may include:

- radiation therapy to the tumor and lymph nodes in the neck
- chemotherapy given with radiation therapy, followed by more chemotherapy
- chemotherapy followed by more chemotherapy given with radiation therapy
- chemotherapy followed by radiation therapy (under study)
- surgery to remove lymph nodes if they still contain cancer cells after initial treatment

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Treatment of Stage IVB and Recurrent Nasopharyngeal Cancer

For information about the treatments listed below, see the Treatment Option Overview section.

Treatment of stage IVB (metastatic) or recurrent nasopharyngeal cancer may include:

- intensity-modulated radiation therapy, stereotactic radiation therapy, or internal radiation therapy
- surgery
- chemotherapy

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## To Learn More About Nasopharyngeal Cancer

For more information from the National Cancer Institute about nasopharyngeal cancer, visit:

- Head and Neck Cancer Home Page (https://www.cancer.gov/types/head-and-neck)
- Oral Cavity and Nasopharyngeal Cancers Screening
- Oral Complications of Cancer Therapies
- Drugs Approved for Head and Neck Cancer (https://www.cancer.gov/about-cancer/treatment/drugs/head-neck)
- Head and Neck Cancers (https://www.cancer.gov/types/head-and-neck/head-neck-fact-sheet)
- Tobacco (https://www.cancer.gov/about-cancer/causes-prevention/risk/tobacco) (includes help quitting)

For general cancer information and other resources from the National Cancer Institute, visit:

- About Cancer (https://www.cancer.gov/about-cancer)
- Cancer Staging (https://www.cancer.gov/about-cancer/diagnosis-staging/staging)
- Chemotherapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/chemo-and-you)
- Radiation Therapy and You: Support for People With Cancer (https://www.cancer.gov/publications/patient-education/radiation-therapy-and-you)
- Coping with Cancer (https://www.cancer.gov/about-cancer/coping)
- Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors.html)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of adult nasopharyngeal cancer. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Nasopharyngeal Cancer Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/head-and-neck/patient/adult/nasopharyngeal-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389409]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).